# Cancer Therapy Interactions With Foods and Dietary Supplements (PDQ®)

Patient Version

This PDQ cancer information summary has current information about cancer therapy interactions with foods and dietary supplements in people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board.

## General Information

Over a third of adults with cancer in the United States use some form of complementary and alternative medicine (CAM) product. CAM products may include dietary supplements, herbal products, and special teas. Taking anticancer drugs and CAM products together may cause a person to have an undesired (adverse) reaction. Talk to your doctor about the CAM products you use before you begin treatment.

When dietary supplements, herbs, or other CAM products are taken with an anticancer drug, they could change the way the cancer drug works in a person's body. They may change how the cancer drug is absorbed and distributed (metabolized) in the body tissues, or how it is removed (excreted) from the body.

Special enzymes and other proteins help drugs work against cancer in the body. The cytochrome P450 superfamily of enzymes are important for how the body metabolizes many cancer drugs. P-glycoprotein, a special protein that helps remove substances from cells, is also involved in how cancer drugs work in a person's body. If a CAM product disturbs these systems, the cancer drug will not work like it should, and the person will not receive the full benefits of the drug.

Some studies have been done on taking CAM products with cancer drugs. This summary covers some of the possible adverse reactions from taking CAM products and cancer drugs together.

## Antioxidants

### Questions and Answers About Antioxidants

1. What are antioxidants?
  Antioxidants are natural or man-made substances. They are found in foods and dietary supplements that protect cells from the damage caused by free radicals (unstable molecules made by oxidation during normal metabolism). Free radicals may play a part in cancer, heart disease, stroke, and other diseases of aging.
  Some common dietary antioxidants include the following:
  - Vitamin C (ascorbate).
  - Vitamin E.
  - Flavonoids (such as soy isoflavones, green tea catechins).
  - Beta-carotene.
  - Glutathione.
2. How are antioxidants given or taken?
  Antioxidants found in fruits, vegetables, and dietary supplements are taken by mouth.
3. Have any laboratory or animal studies been done on antioxidants and drug interactions?
  For information on laboratory and animal studies done using antioxidants, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Cancer Therapy Interactions With Foods and Dietary Supplements.
4. Have any studies been done on antioxidants and drug interactions in people with cancer?
  One study looked at antioxidant dietary supplement use before and after diagnosis in postmenopausal breast cancer survivors. This study found an increased risk of death and a reduced chance of staying cancer free when antioxidant dietary supplements were used during chemotherapy and radiation therapy. Another study found similar results for people with breast cancer who used antioxidant dietary supplements before and during chemotherapy.
  Clinical trials of people with head and neck cancer who took vitamin E supplements looked at a compound in the supplements known as alpha-tocopherol. Researchers studied alpha-tocopherol to see if it decreased adverse reactions from chemotherapy and radiation therapy. Although some clinical trials reported that alpha-tocopherol may reduce damage to the body caused by radiation therapy, other clinical trials found there was a higher risk of cancer coming back.
5. Have any side effects or risks been reported from antioxidants?
  Antioxidant dietary supplements that are taken while being treated with chemotherapy or radiation therapy may lower the chance of staying cancer free. Some people take antioxidants because they think the supplement will protect and repair healthy cells damaged by cancer drugs. More research is needed to find out if antioxidant supplements are safe and effective as a complementary therapy when taken with standard cancer treatment.
6. Are antioxidants approved by the United States Food and Drug Administration (FDA) for use as a cancer treatment in the United States?
  The FDA has not approved the use of antioxidants as a treatment for cancer or any other medical condition.
  Antioxidants are available in the United States in food products and dietary supplements. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of antioxidant supplements may not be the same.

## Herbs

### Questions and Answers About Ginseng

1. What is ginseng?
  Ginseng is a root that has been used as a dietary supplement in traditional Chinese medicine. People take ginseng for the following health benefits:
  - To improve one's focus and quality of life.
  - To build up the immune system.
  - To help with health problems such as heart disease, depression, and anxiety.
2. How is ginseng given or taken?
  Ginseng is a dietary supplement that is taken by mouth.
3. Have any laboratory or animal studies been done on ginseng and drug interactions?
  For information on laboratory and animal studies done using ginseng, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Cancer Therapy Interactions With Foods and Dietary Supplements.
4. Have any studies been done on ginseng and drug interactions in people with cancer?
  A case study found that a young man who was treated with an anticancer drug and took ginseng as part of an energy drink was diagnosed with liver damage. More research is needed to find out if the ginseng or something else in the energy drink caused the liver damage.
5. Have any side effects or risks been reported from ginseng?
  The most common side effect is poor sleep. Other side effects from taking ginseng supplements include the following:
  - Menstrual problems.
  - Breast pain.
  - Fast heart rate.
  - High or low blood pressure.
  - Headache.
  - Loss of appetite.
  - Digestive problems.
6. Is ginseng approved by the FDA for use as a cancer treatment in the United States?
  The FDA has not approved the use of ginseng as a treatment for cancer or any other medical condition.
  Ginseng is available in the United States as a dietary supplement. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of ginseng supplements may not be the same.

### Questions and Answers About Scutellaria baicalensis/Wogonin

1. What is Scutellaria baicalensis?
  Scutellaria baicalensis is a plant used in traditional Chinese medicine to treat medical conditions such as diarrhea, hepatitis, infections, and inflammation. Scutellaria baicalensis is also known as wogonin, Chinese skullcap, or Huang Qin.
2. How is Scutellaria baicalensis given or taken?
  Scutellaria baicalensis is a dietary supplement that is taken by mouth.
3. Have any laboratory or animal studies been done on Scutellaria baicalensis and drug interactions?
  For information on laboratory and animal studies done using Scutellaria baicalensis, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Cancer Therapy Interactions With Foods and Dietary Supplements.
4. Have any studies been done on Scutellaria baicalensis and drug interactions in people with cancer?
  No clinical trials or other studies in people with cancer have been published in peer-reviewed scientific journals to support the safety or effectiveness of Scutellaria baicalensis.
5. Have any side effects or risks been reported from Scutellaria baicalensis?
  Information about side effects or risks from taking Scutellaria baicalensis is not available because there have been no clinical trials or other studies done in people with cancer. Some research has shown that Scutellaria baicalensis may change the anticancer effects of certain drugs.
6. Is Scutellaria baicalensis approved by the FDA for use as a cancer treatment in the United States?
  The FDA has not approved the use of Scutellaria baicalensis as a treatment for cancer or any other medical condition.
  Scutellaria baicalensis is available in the United States as a dietary supplement. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of Scutellaria baicalensis may not be the same.

### Questions and Answers About St. John's Wort

1. What is St. John's wort?
  St. John’s wort (Hypericum perforatum) is a flowering plant that has been used to help with sleep issues, lung and kidney problems, and wound healing. Today, it is often used for depression.
2. How is St. John's wort given or taken?
  St. John’s wort is a dietary supplement. The flowers from the St. John’s wort plant can be taken in the form of tablets, teas, capsules, or extracts.
3. Have any laboratory or animal studies been done on St. John's wort and drug interactions?
  For information on laboratory and animal studies done using St. John’s wort, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Cancer Therapy Interactions With Foods and Dietary Supplements.
4. Have any studies been done on St. John's wort and drug interactions in people with cancer?
  Studies have found that patients who took St. John’s wort while receiving anticancer drugs had lower levels of the drugs in their blood. Anticancer drugs may be less effective if taken with St. John’s wort.
5. Have any side effects or risks been reported from St. John's wort?
  St. John’s wort can interact with how other medicines are absorbed in the body. These interactions can cause side effects, including the following:
  - Sensitivity to sunlight.
  - Trouble sleeping.
  - Anxiety.
  - Dry mouth.
  - Dizziness.
  - Digestive problems.
  - Fatigue.
  - Headache.
  - Problems with sexual function.
  St. John’s wort can interact with medicines for depression causing unsafe levels of serotonin, a chemical substance found in the brain. When serotonin increases to a certain level, it can be dangerous.
6. Is St. John’s wort approved by the FDA for use as a cancer treatment in the United States?
  The FDA has not approved the use of St. John’s wort as a treatment for cancer or any other medical condition.
  St. John’s wort is available in the United States as a dietary supplement. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of St. John's wort may not be the same.

### Questions and Answers About Thunder God Vine

1. What is thunder god vine?
  Thunder god vine, also known as Tripterygium wilfordii Hook f, is an herb used in traditional Chinese medicine to help with inflammation and lessen immune responses. Two ingredients in thunder god vine—triptolide and celastrol—are being studied for anticancer effects.
2. How is thunder god vine given or taken?
  Thunder god vine is a dietary supplement that can be taken by mouth. It can also be applied to the skin.
3. Have any laboratory or animal studies been done on thunder god vine and drug interactions?
  For information on laboratory and animal studies done using thunder god vine, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Cancer Therapy Interactions With Foods and Dietary Supplements.
4. Have any studies been done on thunder god vine and drug interactions in people with cancer?
  No clinical trials or other studies in people with cancer have been published in peer-reviewed scientific journals to support the safety or effectiveness of thunder god vine.
5. Have any side effects or risks been reported from thunder god vine?
  Thunder god vine can cause many side effects, including the following:
  - Organ damage.
  - Death.
  - Digestive problems.
  - Abnormal heart rate.
  - Low blood count.
  - Kidney problems.
  - Liver problems.
  - Skin conditions.
  - Infertility.
  - Headache.
  - Hair loss.
6. Is thunder god vine approved by the FDA for use as a cancer treatment in the United States?
  The FDA has not approved the use of thunder god vine as a treatment for cancer or any other medical condition.
  Thunder god vine is available in the United States as a dietary supplement. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of thunder god vine may not be the same.

## Foods

### Questions and Answers About Grapefruit

1. What is grapefruit?
  Grapefruit is a fruit in the citrus family. Grapefruit and fruits similar to grapefruit, such as Seville oranges, pomelos, and limes, are known to interact with anticancer drugs. The seeds from the fruit contain furanocoumarin that may cause adverse reactions.
2. How is grapefruit given or taken?
  People eat grapefruit or take it as a dietary supplement (in the form of an extract made from the seeds). Some people drink grapefruit juice.
3. Have any laboratory or animal studies been done on grapefruit and drug interactions?
  For information on laboratory and animal studies done using grapefruit, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Cancer Therapy Interactions With Foods and Dietary Supplements.
4. Have any studies been done on grapefruit and drug interactions in people with cancer?
  A small randomized trial found that less of the anticancer drug etoposide reached the bloodstream in people who drank grapefruit juice than in people who did not drink grapefruit juice. However, studies with the anticancer drugs imatinib, sunitinib, and nilotinib have shown that drinking grapefruit juice increased the amount of anticancer drug that reached the bloodstream.
5. Have any side effects or risks been reported from grapefruit?
  Grapefruit can interact with many medicines used to treat a variety of health problems. Grapefruit juice and the furanocoumarin in grapefruit seeds have been known to interact with some anticancer drugs.
6. Is grapefruit approved by the FDA for use as a cancer treatment in the United States?
  The FDA has not approved the use of grapefruit as a treatment for cancer or any other medical condition.
  Grapefruit is available in the United States in food products or as a dietary supplement. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of grapefruit seed extracts may not be the same.

### Questions and Answers About Green Tea

1. What is green tea?
  Green tea comes from the Camellia sinensis plant. Green tea has been used to lower cholesterol and improve weight loss, mental alertness, and digestive symptoms.
  The health benefits studied in green tea are thought to be from compounds called polyphenols. Polyphenols are a group of plant chemicals that include catechins (antioxidants that help protect cells from damage). Catechins make up most of the polyphenols in green tea.
2. How is green tea given or taken?
  People usually drink green tea or take it as a dietary supplement in the form of a dried herb or an extract.
3. Have any laboratory or animal studies been done on green tea and drug interactions?
  For information on laboratory and animal studies done using green tea, see the Laboratory/Animal/Preclinical Studies section of the health professional version of Cancer Therapy Interactions With Foods and Dietary Supplements.
4. Have any studies been done on green tea and drug interactions in people with cancer?
  Clinical research with people is limited. A case study of a patient with metastatic renal cell carcinoma who drank green tea while he received an anticancer drug reported worse control of symptoms. The symptoms improved when he stopped drinking the green tea.
5. Have any side effects or risks been reported from green tea?
  Risks and side effects result from drinking large amounts of green tea (more than 8 cups per day). In rare cases, green tea extracts taken in pill form have caused damage to the liver. Green tea may interact with other medicines. Studies have not determined whether green tea is safe or effective when used with anticancer drugs.
6. Is green tea approved by the FDA for use as a cancer treatment in the United States?
  The FDA has not approved the use of green tea as a treatment for cancer.
  The FDA Division of Drug Oncology Products recommends that green tea extract be taken with food by participants in clinical trials and that liver function tests be considered during treatment.
  Green tea is available in the United States in food products and dietary supplements. The FDA regulates dietary supplements separately from foods, cosmetics, and drugs. The FDA's Good Manufacturing Practices require that every finished batch of supplements is safe and that the claims on the label are true and do not mislead the consumer. However, the FDA does not regularly review the way that supplements are made, so all batches and brands of green tea extract may not be the same.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about cancer therapy interactions with foods and dietary supplements in people with cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Integrative, Alternative, and Complementary Therapies Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/cam).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Integrative, Alternative, and Complementary Therapies Editorial Board. PDQ Cancer Therapy Interactions With Foods and Dietary Supplements. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/cam/patient/dietary-interactions-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).

## General CAM Information

Complementary and alternative medicine (CAM)—also called integrative medicine—includes a broad range of healing philosophies, approaches, and therapies. A therapy is generally called complementary when it is used in addition to conventional treatments; it is often called alternative when it is used instead of conventional treatment. (Conventional treatments are those that are widely accepted and practiced by the mainstream medical community.) Depending on how they are used, some therapies can be considered either complementary or alternative. Complementary and alternative therapies are used in an effort to prevent illness, reduce stress, prevent or reduce side effects and symptoms, or control or cure disease.

Unlike conventional treatments for cancer, complementary and alternative therapies are often not covered by insurance companies. Patients should check with their insurance provider to find out about coverage for complementary and alternative therapies.

Cancer patients considering complementary and alternative therapies should discuss this decision with their doctor, nurse, or pharmacist as they would any type of treatment. Some complementary and alternative therapies may affect their standard treatment or may be harmful when used with conventional treatment.

## Evaluation of CAM Therapies

It is important that the same scientific methods used to test conventional therapies are used to test CAM therapies. The National Cancer Institute and the National Center for Complementary and Integrative Health (NCCIH) are sponsoring a number of clinical trials (research studies) at medical centers to test CAM therapies for use in cancer.

Conventional approaches to cancer treatment have generally been studied for safety and effectiveness through a scientific process that includes clinical trials with large numbers of patients. Less is known about the safety and effectiveness of complementary and alternative methods. Few CAM therapies have been tested using demanding scientific methods. A small number of CAM therapies that were thought to be purely alternative approaches are now being used in cancer treatment—not as cures, but as complementary therapies that may help patients feel better and recover faster. One example is acupuncture. According to a panel of experts at a National Institutes of Health (NIH) meeting in November 1997, acupuncture has been found to help control nausea and vomiting caused by chemotherapy and pain related to surgery. However, some approaches, such as the use of laetrile, have been studied and found not to work and to possibly cause harm.

The NCI Best Case Series Program (https://cam.cancer.gov/indentifying_novel_cam_therapies/best_case_series_program.htm) which was started in 1991, is one way CAM approaches that are being used in practice are being studied. The program is overseen by the NCI’s Office of Cancer Complementary and Alternative Medicine (OCCAM). Health care professionals who offer alternative cancer therapies submit their patients’ medical records and related materials to OCCAM. OCCAM carefully reviews these materials to see if any seem worth further research.

## Questions to Ask Your Health Care Provider About CAM

When considering complementary and alternative therapies, patients should ask their health care provider the following questions:

- What side effects can be expected?
- What are the risks related to this therapy?
- What benefits can be expected from this therapy?
- Do the known benefits outweigh the risks?
- Will the therapy affect conventional treatment?
- Is this therapy part of a clinical trial?
- If so, who is the sponsor of the trial?
- Will the therapy be covered by health insurance?

## To Learn More About CAM

National Center for Complementary and Integrative Health (NCCIH)

The National Center for Complementary and Integrative Health (NCCIH) at the National Institutes of Health (NIH) facilitates research and evaluation of complementary and alternative practices, and provides information about a variety of approaches to health professionals and the public.

- NCCIH Clearinghouse
- Post Office Box 7923 Gaithersburg, MD 20898–7923
- Telephone: 1-888-644-6226 (toll free)
- TTY (for deaf and hard of hearing callers): 1-866-464-3615
- E-mail: info@nccih.nih.gov
- Website: https://nccih.nih.gov

CAM on PubMed

NCCIH and the NIH National Library of Medicine (NLM) jointly developed CAM on PubMed (https://nccih.nih.gov/research/camonpubmed), a free and easy-to-use search tool for finding CAM-related journal citations. As a subset of the NLM's PubMed bibliographic database, CAM on PubMed features more than 230,000 references and abstracts for CAM-related articles from scientific journals. This database also provides links to the websites of over 1,800 journals, allowing users to view full-text articles. (A subscription or other fee may be required to access full-text articles.)

Office of Cancer Complementary and Alternative Medicine

The NCI Office of Cancer Complementary and Alternative Medicine (OCCAM) coordinates the activities of the NCI in the area of complementary and alternative medicine (CAM). OCCAM supports CAM cancer research and provides information about cancer-related CAM to health providers and the general public via the NCI website (https://www.cancer.gov/).

National Cancer Institute (NCI) Cancer Information Service

U.S. residents may call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, toll free at 1-800-4-CANCER (1-800-422-6237) Monday through Friday from 9:00 am to 9:00 pm. A trained Cancer Information Specialist is available to answer your questions.

Food and Drug Administration

The Food and Drug Administration (FDA) regulates drugs and medical devices to ensure that they are safe and effective.

- Food and Drug Administration
- 10903 New Hampshire Avenue
- Silver Spring, MD 20993
- Telephone: 1-888-463-6332 (toll free)
- Website: http://www.fda.gov

Federal Trade Commission

The Federal Trade Commission (FTC) enforces consumer protection laws. Publications available from the FTC include:

- Who Cares: Sources of Information About Health Care Products and Services
- Fraudulent Health Claims: Don’t Be Fooled

- Consumer Response Center
- Federal Trade Commission
- 600 Pennsylvania Avenue, NW
- Washington, DC 20580
- Telephone: 1-877-FTC-HELP (1-877-382-4357) (toll free)
- TTY (for deaf and hard of hearing callers): 202-326-2502
- Website: http://www.ftc.gov